# CEBPA-Associated Familial Acute Myeloid Leukemia (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of CEBPA-associated familial AML. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction and Clinical Manifestations of CEBPA-Associated Familial Acute Myeloid Leukemia (AML)

The CEBPA gene is a granulocytic transcription factor (C/EBPα) that serves an important role in myeloid cell differentiation. Somatic mutations in CEBPA occur in approximately 10% to 15% of all AML cases. The presence of two somatic mutations in CEBPA (also known as CEBPAdm) is recognized as a unique clinical entity associated with favorable outcomes, even in the event of relapse.[1] Germline pathogenic variants in CEBPA were reported in 2004 in a family with hereditary, nonsyndromic AML.[2] CEBPA-associated familial AML (also known as familial AML with a CEBPA variant) became the second autosomal dominant AML predisposition syndrome described (RUNX1-familial platelet disorder was the first).[3]

Features of CEBPA-associated familial AML include the following:

- Highly penetrant: Unlike several other myelodysplastic syndromes (MDS)/AML predisposition syndromes, germline CEBPA pathogenic variants appear to be highly penetrant, conferring greater than a 90% lifetime risk to develop AML.[4-6]
- Early-onset AML: Germline CEBPA pathogenic variants are associated with early-onset AML that can occur in childhood.[7] Published research on families with CEBPA germline pathogenic variants have reported that AML onset can occur between the ages of 1.75 to 46 years.
- De novo AML: Inherited CEBPA pathogenic variants can predispose individuals to de novo AML without prior prolonged antecedent cytopenias or multilineage dysplasia.[2]
- AML similar to somatic CEBPA variant(s): The characteristics of AML arising from a germline CEBPA pathogenic variant are strikingly similar to the characteristics seen in patients with somatic CEBPA mutation(s). These include the following: normal cytogenetics, French-American-British (FAB) AML subtypes M1 and M2, numerous Auer rods seen in peripheral blood and bone marrow blasts, and aberrant CD7 expression detected by flow cytometry.[8]

### References

Taskesen E, Bullinger L, Corbacioglu A, et al.: Prognostic impact, concurrent genetic mutations, and gene expression features of AML with CEBPA mutations in a cohort of 1182 cytogenetically normal AML patients: further evidence for CEBPA double mutant AML as a distinctive disease entity. Blood 117 (8): 2469-75, 2011.21177436
Smith ML, Cavenagh JD, Lister TA, et al.: Mutation of CEBPA in familial acute myeloid leukemia. N Engl J Med 351 (23): 2403-7, 2004.15575056
Johns Hopkins University: Online Mendelian Inheritance in Man: CCAAT/Enhancer-Binding Protein, Alpha; CEBPA. Johns Hopkins University, 2022. Available online. (https://www.omim.org/entry/116897) Last accessed October 9, 2023.
Owen C, Barnett M, Fitzgibbon J: Familial myelodysplasia and acute myeloid leukaemia--a review. Br J Haematol 140 (2): 123-32, 2008.18173751
Pabst T, Eyholzer M, Fos J, et al.: Heterogeneity within AML with CEBPA mutations; only CEBPA double mutations, but not single CEBPA mutations are associated with favourable prognosis. Br J Cancer 100 (8): 1343-6, 2009.19277035
Renneville A, Roumier C, Biggio V, et al.: Cooperating gene mutations in acute myeloid leukemia: a review of the literature. Leukemia 22 (5): 915-31, 2008.18288131
Tawana K, Wang J, Renneville A, et al.: Disease evolution and outcomes in familial AML with germline CEBPA mutations. Blood 126 (10): 1214-23, 2015.26162409
Nickels EM, Soodalter J, Churpek JE, et al.: Recognizing familial myeloid leukemia in adults. Ther Adv Hematol 4 (4): 254-69, 2013.23926458

## Genetics and Molecular Biology of CEBPA-Associated Familial Acute Myeloid Leukemia (AML)

The CEBPA gene is located on chromosome 19q13.1. Leukemia arising from an inherited germline CEBPA pathogenic variant follows a two-hit mechanism of leukemogenesis. Germline CEBPA pathogenic variants cluster in the N-terminus (5’ end) of the CEBPA gene. The second somatic variant (at the C-terminus; 3’ end) is acquired on the other CEBPA allele (in trans) when leukemia develops.[1,2] Interestingly, while the same germline pathogenic variants are present in multiple family members, individuals within families acquire distinct somatic variants in the C-terminus region of CEBPA. In some cases, more than one C-terminus variant can be acquired, suggesting two distinct episodes of AML in one individual.[3] Patients with CEBPA germline pathogenic variants often acquire GATA2 somatic variants when they develop AML.[4]

The prevalence of CEBPA-associated familial AML, like that of many other inherited AML predisposition syndromes, is unknown. However, germline CEBPA pathogenic variants may account for up to 1% of all AML cases, as extrapolated from somatic testing data.[5,6] In one series, 2 of 18 patients (11%) with AML and a somatic CEBPA variant (also called CEBPA-mutated AML) were found to carry germline pathogenic variants in the N-terminus of CEBPA.[7] In a second study, 5 of 71 patients (7%) with CEBPA-mutated AML carried a CEBPA germline pathogenic variant, suggesting that approximately 10% of individuals with biallelic CEBPA-mutated AML harbor germline pathogenic variants in CEBPA.[8] Therefore, genetic testing for CEBPA germline pathogenic variants is indicated in any patient who presents with AML and CEBPA somatic variants (particularly biallelic CEBPA somatic variants).

### References

Leroy H, Roumier C, Huyghe P, et al.: CEBPA point mutations in hematological malignancies. Leukemia 19 (3): 329-34, 2005.15674366
Kraft IL, Godley LA: Identifying potential germline variants from sequencing hematopoietic malignancies. Blood 136 (22): 2498-2506, 2020.33236764
Sellick GS, Spendlove HE, Catovsky D, et al.: Further evidence that germline CEBPA mutations cause dominant inheritance of acute myeloid leukaemia. Leukemia 19 (7): 1276-8, 2005.15902292
Green CL, Tawana K, Hills RK, et al.: GATA2 mutations in sporadic and familial acute myeloid leukaemia patients with CEBPA mutations. Br J Haematol 161 (5): 701-705, 2013.23560626
Pabst T, Eyholzer M, Fos J, et al.: Heterogeneity within AML with CEBPA mutations; only CEBPA double mutations, but not single CEBPA mutations are associated with favourable prognosis. Br J Cancer 100 (8): 1343-6, 2009.19277035
Preudhomme C, Sagot C, Boissel N, et al.: Favorable prognostic significance of CEBPA mutations in patients with de novo acute myeloid leukemia: a study from the Acute Leukemia French Association (ALFA). Blood 100 (8): 2717-23, 2002.12351377
Pabst T, Eyholzer M, Haefliger S, et al.: Somatic CEBPA mutations are a frequent second event in families with germline CEBPA mutations and familial acute myeloid leukemia. J Clin Oncol 26 (31): 5088-93, 2008.18768433
Taskesen E, Bullinger L, Corbacioglu A, et al.: Prognostic impact, concurrent genetic mutations, and gene expression features of AML with CEBPA mutations in a cohort of 1182 cytogenetically normal AML patients: further evidence for CEBPA double mutant AML as a distinctive disease entity. Blood 117 (8): 2469-75, 2011.21177436

## Management and Prognosis for CEBPA-Associated Familial Acute Myeloid Leukemia (AML)

CEBPA-associated familial AML is similar to sporadic AML with somatic biallelic CEBPA variants in that both often have a favorable prognosis and preclude the need for hematopoietic stem cell transplant (HSCT). However, in individuals with AML arising from a germline CEBPA pathogenic variant, the HSCT’s purpose is to both treat the AML and to replace the constitutional stem cell population that harbors the AML susceptibility.[1] Like in all inherited predispositions to AML, great care needs to be taken to avoid use of a stem cell donor who carries a germline CEBPA pathogenic variant. Donor-derived leukemia has been reported in individuals with CEBPA-associated familial AML who received a transplant, unknowingly, from a donor who carried a CEBPA germline pathogenic variant.[2]

### References

Stelljes M, Corbacioglu A, Schlenk RF, et al.: Allogeneic stem cell transplant to eliminate germline mutations in the gene for CCAAT-enhancer-binding protein α from hematopoietic cells in a family with AML. Leukemia 25 (7): 1209-10, 2011.21455213
Xiao H, Shi J, Luo Y, et al.: First report of multiple CEBPA mutations contributing to donor origin of leukemia relapse after allogeneic hematopoietic stem cell transplantation. Blood 117 (19): 5257-60, 2011.21403128

## Latest Updates to This Summary (11/25/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about CEBPA-associated familial AML. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for CEBPA-Associated Familial Acute Myeloid Leukemia are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ CEBPA-Associated Familial Acute Myeloid Leukemia. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/cebpa-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38113348]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).